# MBD4-Associated Neoplasia Syndrome (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of MBD4-associated neoplasia syndrome. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

The association between germline, biallelic MBD4 loss-of-function variants and a predisposition to acute myeloid leukemia (AML) was first described in 2018.[1] In this initial report, hallmark mutational features from three patients with biallelic germline MBD4 pathogenic variants were described, including an increased somatic variant rate with the accumulation of CG>TG somatic leukemogenic variants in genes frequently mutated in myeloid malignancies. Additional published reports suggest that biallelic MBD4 pathogenic variants may be associated with a multicancer predisposition syndrome, called MBD4-associated neoplasia syndrome (MANS). In addition to increasing the risk of developing AML, MANS increases the risk of gastrointestinal polyposis (comparable to attenuated familial adenomatous polyposis) and may also increase the risk of schwannoma.[2,3] There are conflicting data from a limited number of studies on whether heterozygous germline pathogenic variants in MBD4 increase the risk of developing uveal melanoma.[4,5]

### References

Sanders MA, Chew E, Flensburg C, et al.: MBD4 guards against methylation damage and germ line deficiency predisposes to clonal hematopoiesis and early-onset AML. Blood 132 (14): 1526-1534, 2018.30049810
Palles C, West HD, Chew E, et al.: Germline MBD4 deficiency causes a multi-tumor predisposition syndrome. Am J Hum Genet 109 (5): 953-960, 2022.35460607
Blombery P, Ryland GL, Fox LC, et al.: Methyl-CpG binding domain 4, DNA glycosylase (MBD4)-associated neoplasia syndrome associated with a homozygous missense variant in MBD4: Expansion of an emerging phenotype. Br J Haematol 198 (1): 196-199, 2022.35381620
Repo P, Jäntti JE, Järvinen RS, et al.: Germline loss-of-function variants in MBD4 are rare in Finnish patients with uveal melanoma. Pigment Cell Melanoma Res 33 (5): 756-762, 2020.32421892
Derrien AC, Rodrigues M, Eeckhoutte A, et al.: Germline MBD4 Mutations and Predisposition to Uveal Melanoma. J Natl Cancer Inst 113 (1): 80-87, 2021.32239153

## Genetics and Molecular Biology of MBD4-Associated Neoplasia Syndrome

The MBD4 gene codes for a DNA glycosylase (similar to MUTYH and NTHL1) that is recruited in the base excision repair (BER) pathway. In mouse studies, MBD4 helped repair methylation damage incurred by spontaneous deamination of 5’-methylcytosine to thymine, which is characterized by mismatched CG>TG.[1,2] Individuals with biallelic germline MBD4 pathogenic variants lack the ability to use MBD4 for BER of GT mismatches. In turn, cancer risk is increased. Resulting cancers also appear to have elevated mutational burden and are enriched for this specific CG>TG signature.[3]

MBD4 is located at chromosome 3q21.3. Germline disease-causing MDB4 variants described in acute myeloid leukemia are loss-of-function homozygous or compound heterozygous variants. Therefore, MANS has an autosomal recessive inheritance pattern. The types of loss-of-function variants reported include nonsense variants (conferring abnormal splicing), deletions, and duplications.[3]

### References

Millar CB, Guy J, Sansom OJ, et al.: Enhanced CpG mutability and tumorigenesis in MBD4-deficient mice. Science 297 (5580): 403-5, 2002.12130785
Wong E, Yang K, Kuraguchi M, et al.: Mbd4 inactivation increases Cright-arrowT transition mutations and promotes gastrointestinal tumor formation. Proc Natl Acad Sci U S A 99 (23): 14937-42, 2002.12417741
Palles C, West HD, Chew E, et al.: Germline MBD4 deficiency causes a multi-tumor predisposition syndrome. Am J Hum Genet 109 (5): 953-960, 2022.35460607

## Clinical Manifestations of MBD4-Associated Neoplasia Syndrome

### Acute Myeloid Leukemia (AML) in MBD4-Associated Neoplasia Syndrome

Nine patients with this syndrome have been reported in the literature.[1-3] Based on these reports, individuals with germline MBD4-associated AML tend to develop early onset disease, with all reported AML cases (four) occurring between 33 and 49 years. A fifth patient was diagnosed with myelodysplastic syndrome at age 37 years. There are not enough cases to estimate penetrance. Germline genetic testing for MBD4-associated neoplasia syndrome (MANS) may be indicated for patients with AML and the following: 1) increased mutational burden on myeloid neoplasm somatic sequencing, especially when the mutational burden is enriched for CG>GT variants; and/or 2) a personal history of colonic polyposis, schwannomatosis, or uveal melanoma (UVM). Because MANS is autosomal recessive, it may arise in individuals who do not have family histories of leukemia or other MANS-associated manifestations.

### Colorectal Polyposis in MBD4-Associated Neoplasia Syndrome

There are nine reported cases of MANS in the scientific literature.[1-3] Of these nine individuals, eight underwent colonoscopy at the time these cases were published. Almost all polyps were adenomas, and counts exceeded 20 polyps over multiple colonoscopies. One individual had more than 130 polyps.[1] Another individual had 75 polyps, leading to colectomy at age 32 years.[2] Another individual developed colorectal cancer (CRC) at age 40 years.[1]

One study ran whole-exome or whole-genome sequencing on 309 individuals who previously underwent genetic testing, which did not find a pathogenic variant.[1] These individuals had one of the following: 1) multiple colorectal adenomas, or 2) family histories of multiple individuals with CRC. Patients with a biallelic loss of MBD4 presented with oligopolyposis. Cancers observed in affected individuals included UVM, CRC, and AML. Most of the adenomas that were found had an accumulation of CG>TG transitions in well-known CRC driver genes like APC, KRAS, and AMER1.

One differential diagnosis for individuals with a history of early onset leukemia and polyposis is a history of receiving total body radiation as a part of a conditioning regimen for hematopoietic stem cell transplantation (HSCT). These individuals are also at an increased risk for gastrointestinal polyps. A case series reported on five patients (all < 1 yr) who underwent HSCT for leukemia after receiving total-body radiation.[4] Every patient developed symptomatic gastrointestinal polyps 0.75 to 5.75 years after HSCT.

### Uveal Melanoma in MBD4-Associated Neoplasia Syndrome

It is unclear if MANS is associated with an increased risk for UVM. UVM was reported in two individuals with MANS: one individual developed two primary UVMs at age 38 years and age 45 years, and one individual developed UVM at age 53 years.[1] Interestingly, both individuals with UVM and MANS carried at least one c.939dup MBD4 variant.

### Other Manifestations in MBD4-Associated Neoplasia Syndrome

There are two reports of schwannomas in individuals with MANS. One individual had a vestibular schwannoma at age 34 years.[2] Another individual had two schwannomas at age 50 years and also had a meningioma at age 41 years.[1]

### References

Palles C, West HD, Chew E, et al.: Germline MBD4 deficiency causes a multi-tumor predisposition syndrome. Am J Hum Genet 109 (5): 953-960, 2022.35460607
Blombery P, Ryland GL, Fox LC, et al.: Methyl-CpG binding domain 4, DNA glycosylase (MBD4)-associated neoplasia syndrome associated with a homozygous missense variant in MBD4: Expansion of an emerging phenotype. Br J Haematol 198 (1): 196-199, 2022.35381620
Sanders MA, Chew E, Flensburg C, et al.: MBD4 guards against methylation damage and germ line deficiency predisposes to clonal hematopoiesis and early-onset AML. Blood 132 (14): 1526-1534, 2018.30049810
Knight B, Anderson L, Lerner D, et al.: Case Series: Development of Polyps as a Late Effect After Total Body Irradiation-based Hematopoietic Cell Transplantation in Children With High-risk Leukemia. J Pediatr Hematol Oncol 43 (8): e1159-e1163, 2021.33828034

## Management and Prognosis for MBD4-Associated Neoplasia Syndrome

National Comprehensive Cancer Network (NCCN) guidelines provide management recommendations for individuals with molecularly confirmed MBD4-associated neoplasia syndrome (MANS):[1]

- NCCN recommends colonoscopy beginning at age 18 to 20 years or at the time of diagnosis to screen for colorectal polyps. Colonoscopy can be repeated every 2 to 3 years.
- NCCN recommends annual ophthalmologic exam when the individual is diagnosed with MANS.
- NCCN recommends complete blood count (CBC) when the individual is diagnosed with MANS, but it does not comment on the frequency of CBC afterwards. There is no consensus on the ideal frequency for CBC in patients with MANS.

Individualized treatment recommendations do not yet exist for individuals with MANS.

### References

National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal, Endometrial, and Gastric. Version 2.2024. Plymouth Meeting, PA: National Comprehensive Cancer Network, 2024. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_ceg.pdf) Last accessed October 7, 2024.

## Latest Updates to This PDQ Summary (10/29/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

This is a new summary.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about MBD4-Associated Neoplasia Syndrome. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for MBD4-Associated Neoplasia Syndrome are:

- Julia Cooper, MS, CGC (Ohio State University)
- Courtney DiNardo, MD, MSC (University of Texas, M.D. Anderson Cancer Center)
- Marcin Wlodarski, MD, PhD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ MBD4-Associated Neoplasia Syndrome. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/mbd4-hp-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).